# Birt-Hogg-Dubé Syndrome (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the genetics of Birt-Hogg-Dubé syndrome (BHD). It is intended as a resource to inform and assist clinicians who care for BHD patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Cancer Genetics Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Introduction

Birt-Hogg-Dubé syndrome (BHD) is an autosomal dominantly inherited hamartomatous disorder caused by germline pathogenic variants in the FLCN gene.[1,2] First described by Birt in 1977, BHD is characterized by cutaneous hamartomas known as fibrofolliculomas/trichodiscomas.[3] Clinical characteristics of BHD also include pulmonary cysts, spontaneous pneumothoraxes, and various histological types of renal tumors.[4] Acrochordons can be found in individuals with BHD, but they are also commonly found in the general population and are therefore, not diagnostic.[5-7]

Disease severity can vary significantly. Skin lesions typically appear during the third or fourth decades of life and increase in size and number with age. Lung cysts are usually bilateral and multifocal. Most individuals with lung cysts are asymptomatic but have a high risk of developing spontaneous pneumothoraxes.

Approximately 15% to 30% of individuals with BHD develop renal tumors, which are typically bilateral, multifocal, and slow growing.[8-10] Tumors are diagnosed at a median age of 46 to 50 years. In BHD, hybrid oncocytic renal tumors (these tumors have features of both oncocytomas and chromophobe histological cell types) (50%), chromophobe renal cell cancers (34%), and oncocytomas (9%) are diagnosed most often. Clear cell and papillary tumors have been described, but they make up less than 10% of all BHD-associated renal tumors.[8] Some families present with renal tumors and/or autosomal dominant spontaneous pneumothoraxes without cutaneous manifestations.[9,11,12]

### Natural History

The clinical characteristics of BHD include fibrofolliculomas/trichodiscomas (types of cutaneous hamartomas), pulmonary cysts/histories of pneumothoraxes, and various histological types of renal tumors. BHD is characterized by phenotypic heterogeneity, and disease severity can vary significantly among family members and between families. To date, there is no evidence of increased risk of skin cancer or malignant transformation of these hamartomatous lesions.

In 2001, a family-based study showed that patients with the clinical diagnosis of BHD were seven times more likely than clinically unaffected family members to develop renal tumors.[13] Patients with clinical diagnoses of BHD were also 50 times more likely than clinically unaffected family members to develop spontaneous pneumothoraxes. This study confirmed that renal tumors and spontaneous pneumothoraxes are both major manifestations of BHD. While BHD-associated renal tumors can be aggressive, they are generally indolent. Most appropriately managed patients will require no more than one partial nephrectomy on each kidney during their lifetimes.[14] Metastatic disease, although described, is rare.[14]

### References

Toro JR, Wei MH, Glenn GM, et al.: BHD mutations, clinical and molecular genetic investigations of Birt-Hogg-Dubé syndrome: a new series of 50 families and a review of published reports. J Med Genet 45 (6): 321-31, 2008.18234728
Nickerson ML, Warren MB, Toro JR, et al.: Mutations in a novel gene lead to kidney tumors, lung wall defects, and benign tumors of the hair follicle in patients with the Birt-Hogg-Dubé syndrome. Cancer Cell 2 (2): 157-64, 2002.12204536
Birt AR, Hogg GR, Dubé WJ: Hereditary multiple fibrofolliculomas with trichodiscomas and acrochordons. Arch Dermatol 113 (12): 1674-7, 1977.596896
Schmidt LS, Linehan WM: Molecular genetics and clinical features of Birt-Hogg-Dubé syndrome. Nat Rev Urol 12 (10): 558-69, 2015.26334087
Boza JC, Trindade EN, Peruzzo J, et al.: Skin manifestations of obesity: a comparative study. J Eur Acad Dermatol Venereol 26 (10): 1220-3, 2012.21929550
Sanfilippo AM, Barrio V, Kulp-Shorten C, et al.: Common pediatric and adolescent skin conditions. J Pediatr Adolesc Gynecol 16 (5): 269-83, 2003.14597015
Yosipovitch G, DeVore A, Dawn A: Obesity and the skin: skin physiology and skin manifestations of obesity. J Am Acad Dermatol 56 (6): 901-16; quiz 917-20, 2007.17504714
Pavlovich CP, Walther MM, Eyler RA, et al.: Renal tumors in the Birt-Hogg-Dubé syndrome. Am J Surg Pathol 26 (12): 1542-52, 2002.12459621 22346902
Benusiglio PR, Giraud S, Deveaux S, et al.: Renal cell tumour characteristics in patients with the Birt-Hogg-Dubé cancer susceptibility syndrome: a retrospective, multicentre study. Orphanet J Rare Dis 9: 163, 2014.25519458
Shuch B, Vourganti S, Ricketts CJ, et al.: Defining early-onset kidney cancer: implications for germline and somatic mutation testing and clinical management. J Clin Oncol 32 (5): 431-7, 2014.24378414
Graham RB, Nolasco M, Peterlin B, et al.: Nonsense mutations in folliculin presenting as isolated familial spontaneous pneumothorax in adults. Am J Respir Crit Care Med 172 (1): 39-44, 2005.15805188
Painter JN, Tapanainen H, Somer M, et al.: A 4-bp deletion in the Birt-Hogg-Dubé gene (FLCN) causes dominantly inherited spontaneous pneumothorax. Am J Hum Genet 76 (3): 522-7, 2005.15657874
Zbar B, Alvord WG, Glenn G, et al.: Risk of renal and colonic neoplasms and spontaneous pneumothorax in the Birt-Hogg-Dubé syndrome. Cancer Epidemiol Biomarkers Prev 11 (4): 393-400, 2002.11927500
Stamatakis L, Metwalli AR, Middelton LA, et al.: Diagnosis and management of BHD-associated kidney cancer. Fam Cancer 12 (3): 397-402, 2013.23703644

## Genetics

### FLCN Gene

FLCN, a novel tumor suppressor gene, comprises 14 exons located at chromosome 17p11.2.[1] In patients with Birt-Hogg-Dubé syndrome (BHD), FLCN pathogenic variants have been identified in all translated exons,[2-5] and pathogenic intronic variants have also been described.[6] FLCN encodes a 64-kDa phosphoprotein, folliculin (also known as the FLCN protein), which is highly conserved among species.

### Prevalence

Fewer than 1,000 families with BHD have been described across all continents.[7,8] Studies have reported prevalence estimates between 1 in 200,000 and 1 in 500,000 for BHD. A study that analyzed data from a population-based biobank discovered that BHD's incidence may be 10 to 100 times higher than previously thought.[7] Eighty-nine percent of participants in this study did not have BHD diagnoses prior to genetic testing, which highlights the often subtle clinical manifestations associated with BHD.

### Genotype-Phenotype Correlations

A correlation has not been established between specific FLCN variants and renal, pulmonary, and cutaneous manifestations that are associated with BHD. However, individuals with a deletion in the polycytosine tract of exon 11 may have a lower risk of developing BHD-associated renal cancers than individuals with other FLCN variants.[2] However, the sample size in this study was small, and this observation was not replicated in a subsequent study from the same institution.[3] On the basis of the three major clinical manifestations (fibrofolliculomas/trichodiscomas, lung cysts/pneumothoraxes, and renal tumors), penetrance of BHD is considered to be very high. Anticipation is not known to occur in BHD.

### References

Nickerson ML, Warren MB, Toro JR, et al.: Mutations in a novel gene lead to kidney tumors, lung wall defects, and benign tumors of the hair follicle in patients with the Birt-Hogg-Dubé syndrome. Cancer Cell 2 (2): 157-64, 2002.12204536
Schmidt LS, Nickerson ML, Warren MB, et al.: Germline BHD-mutation spectrum and phenotype analysis of a large cohort of families with Birt-Hogg-Dubé syndrome. Am J Hum Genet 76 (6): 1023-33, 2005.15852235
Toro JR, Wei MH, Glenn GM, et al.: BHD mutations, clinical and molecular genetic investigations of Birt-Hogg-Dubé syndrome: a new series of 50 families and a review of published reports. J Med Genet 45 (6): 321-31, 2008.18234728
Maffé A, Toschi B, Circo G, et al.: Constitutional FLCN mutations in patients with suspected Birt-Hogg-Dubé syndrome ascertained for non-cutaneous manifestations. Clin Genet 79 (4): 345-54, 2011.20618353
Kunogi M, Kurihara M, Ikegami TS, et al.: Clinical and genetic spectrum of Birt-Hogg-Dube syndrome patients in whom pneumothorax and/or multiple lung cysts are the presenting feature. J Med Genet 47 (4): 281-7, 2010.20413710
Rossing M, Albrechtsen A, Skytte AB, et al.: Genetic screening of the FLCN gene identify six novel variants and a Danish founder mutation. J Hum Genet 62 (2): 151-157, 2017.27734835
Savatt JM, Shimelis H, Moreno-De-Luca A, et al.: Frequency of truncating FLCN variants and Birt-Hogg-Dubé-associated phenotypes in a health care system population. Genet Med 24 (9): 1857-1866, 2022.35639097
Muller ME, Daccord C, Taffé P, et al.: Prevalence of Birt-Hogg-Dubé Syndrome Determined Through Epidemiological Data on Spontaneous Pneumothorax and Bayes Theorem. Front Med (Lausanne) 8: 631168, 2021.33987191

## Molecular Biology

The identification of a somatic second hit in most Birt-Hogg-Dubé syndrome (BHD)-associated renal tumors strongly suggests that FLCN functions as a tumor suppressor. Both somatic single nucleotide variants in the wild-type FLCN allele and loss of heterozygosity at chromosome 17p have been identified, although the former appears to be the more common mechanism of inactivation of the second FLCN allele.[1]

The precise mechanisms by which inactivation of FLCN leads to tumorigenesis remain to be elucidated. However, folliculin, the protein product of FLCN, has been implicated as a component of the cellular energy–sensing system. Folliculin, in association with either of two novel folliculin-interacting proteins, FNIP1 and FNIP2, interacts with AMPK.[2,3] AMPK is a major cellular energy and nutrient sensor that regulates the activity of mTOR in response to these stimuli.[4] Additionally, both folliculin and FNIP1 are phosphorylated by AMPK, although the significance of this posttranslational modification is not clearly understood. The C-terminal domain of FLCN is required for its interaction with FNIP1 and FNIP2. Most, but not all, tumor-associated FLCN variants predict for a truncated protein missing this C-terminal domain or they appear to destabilize the FLCN protein.[2,5]

The effects of folliculin loss on mTOR activity have been studied by several groups. Tissue-specific activation of mTORC1 was demonstrated in a kidney-specific FLCN knockout mouse model.[6] In this model, both mTORC1 and mTORC2 were activated in renal tumors that developed in FLCN heterozygous knockout mice subsequent to loss of the wild-type allele,[7] suggesting that mTOR may play a role in the development of BHD-related tumors. A subsequent study suggested that aerobic glycolysis is upregulated as a consequence of FLCN inactivation. This glycolytic shift, although moderate, appears to be a consequence of constitutive AMPK activation in FLCN-null cells. AMPK activation has been shown to upregulate hypoxia-inducible factor 1 (HIF1) and is well studied as a transcriptional activator of several genes necessary for aerobic glycolysis.[8] More research on the mechanism(s) of the tumor suppressor function of FLCN is required.

### References

Vocke CD, Yang Y, Pavlovich CP, et al.: High frequency of somatic frameshift BHD gene mutations in Birt-Hogg-Dubé-associated renal tumors. J Natl Cancer Inst 97 (12): 931-5, 2005.15956655
Baba M, Hong SB, Sharma N, et al.: Folliculin encoded by the BHD gene interacts with a binding protein, FNIP1, and AMPK, and is involved in AMPK and mTOR signaling. Proc Natl Acad Sci U S A 103 (42): 15552-7, 2006.17028174
Hasumi H, Baba M, Hong SB, et al.: Identification and characterization of a novel folliculin-interacting protein FNIP2. Gene 415 (1-2): 60-7, 2008.18403135
Shaw RJ: LKB1 and AMP-activated protein kinase control of mTOR signalling and growth. Acta Physiol (Oxf) 196 (1): 65-80, 2009.19245654
Nahorski MS, Reiman A, Lim DH, et al.: Birt Hogg-Dubé syndrome-associated FLCN mutations disrupt protein stability. Hum Mutat 32 (8): 921-9, 2011.21538689
Baba M, Furihata M, Hong SB, et al.: Kidney-targeted Birt-Hogg-Dube gene inactivation in a mouse model: Erk1/2 and Akt-mTOR activation, cell hyperproliferation, and polycystic kidneys. J Natl Cancer Inst 100 (2): 140-54, 2008.18182616
Hasumi Y, Baba M, Ajima R, et al.: Homozygous loss of BHD causes early embryonic lethality and kidney tumor development with activation of mTORC1 and mTORC2. Proc Natl Acad Sci U S A 106 (44): 18722-7, 2009.19850877
Yan M, Gingras MC, Dunlop EA, et al.: The tumor suppressor folliculin regulates AMPK-dependent metabolic transformation. J Clin Invest 124 (6): 2640-50, 2014.24762438

## Clinical Manifestations

The three major features of Birt-Hogg-Dubé syndrome (BHD) include fibrofolliculomas/trichodiscomas, pulmonary cysts and spontaneous pneumothorax, and renal tumors.[1-3]

### Cutaneous Lesions

Individuals with BHD usually present with multiple, small, skin-colored, dome-shaped papules distributed over the face, neck, and upper trunk. The characteristic dermatologic manifestation is a fibrofolliculoma or trichodiscoma (hamartoma of the hair follicle).[4] The age at diagnosis of cutaneous lesions ranges from 20 to 72 years (median age, 54 y). Only a small percentage of carriers of FLCN pathogenic variants lack cutaneous manifestations,[1,5,6] suggesting that this syndromic phenotype is highly penetrant in affected individuals. In two large BHD family studies, 73% and 84% of affected patients in whom skin lesions were biopsied were found to have fibrofolliculomas/trichodiscomas.[1,2]

Histologically, fibrofolliculomas/trichodiscomas are characterized by multiple anastomosing epithelial strands emanating from a central follicle. Mucin-rich or thick connective tissue stroma may encapsulate the epithelial component.[7] Some describe these as lesions that emanate from the sebaceous mantle of the hair follicle. The underlying molecular mechanism, which stems from FLCN loss and drives the development of fibrofolliculomas/trichodiscomas, is unclear, but one report suggests that increased WNT signaling may play a role.[7] Fibrofolliculomas and trichodiscomas are different stages of a single pathologic process.

### Pulmonary Cysts and Spontaneous Pneumothorax

Computed tomography (CT) imaging results showed that lung cysts are present in 85% to 87% of patients with BHD.[1,2] These cysts are often bilateral and multifocal and are located predominantly within the lower lobes of the lung. Most BHD-related lung cysts are asymptomatic; however, individuals affected with BHD have an increased risk of developing spontaneous pneumothorax. Patients with a pathogenic variant in FLCN and a family history of spontaneous pneumothorax had a statistically significant increased risk of spontaneous pneumothorax compared with BHD patients without a family history of spontaneous pneumothorax (P = .011).[8]

In a study of 198 patients with BHD, spontaneous pneumothorax occurrences were comparable between men (20%) and women (29%). Initial pneumothoraxes occurred between the ages of 22 and 75 years.[8] However, patients had their first pneumothorax occurrences at a median age of 38 years, and these typically occurred before the fifth decade of life. Patients had a 6% chance of developing their first spontaneous pneumothoraxes by age 30 years (95% confidence interval [CI], 3%–10%). This probability increased to 75% by age 50 years (95% CI, 19%–32%).[8] A review of English PubMed literature analyzed data from 1,038 patients with BHD, and pneumothoraxes occurred in 50.9% of patients. Pneumothorax incidence seemed to differ between individuals of varying ancestries.[9]

The clinical presentation of spontaneous pneumothorax ranges from asymptomatic to dyspnea and chest pain. Clinical findings include tachypnea or decreased-to-absent breath sounds. Radiographic investigation may require a high-resolution chest CT to confirm the diagnosis because a chest x-ray may not be sensitive enough to detect a loculated pneumothorax. Up to 75% of patients with a history of spontaneous pneumothorax experience a second one. Differences in reported spontaneous pneumothorax recurrence may reflect the efficacy of different treatment modalities.

Histologic findings of pleuropulmonary lesions associated with BHD patients include thin-walled pleural and subpleural cysts and bullae, intraparenchymal air cysts, pleural blebs and changes consistent with spontaneous pneumothorax, and underlying emphysematous changes in lung tissue parenchyma adjacent to the bullae.[5]

### Renal Tumors

Approximately 25% to 35% of individuals with BHD develop renal tumors,[1,4,10,11] which are multifocal in 65% of cases and often bilateral. The frequency of renal tumors among patients with BHD whose medical records were reviewed was 20%, and the frequency of renal tumors among BHD patients evaluated by CT scan was 29%. Most renal tumors associated with BHD are slow growing. Median age at diagnosis is 48 to 50 years (range, 31–71 y).[2,12-14] Men developed renal tumors more often than did women (27 males; 11 females). Renal tumors associated with BHD seem to occur at a younger age than do sporadic forms of renal cell cancer (RCC), in which the median age at diagnosis is 64 years.[15] Figure 1 depicts bilateral renal tumors in a patient with BHD.

Figure 1. Birt-Hogg-Dubé syndrome–associated renal tumors are commonly multifocal and bilateral. Arrows indicate the locations of the tumors.

Axial view of an individual’s midsection showing two tumors in the left kidney and one tumor in the right kidney.

The most common tumors are a hybrid of oncocytoma and chromophobe histologic cell types, so-called oncocytic hybrid tumors, chromophobe RCC, and renal oncocytoma. Only renal oncocytoma is considered a benign tumor.[12] Other histologic renal tumor subtypes, including clear cell renal cell cancer (ccRCC) and papillary renal carcinoma, are uncommon in patients with BHD.[11]

Among 70 BHD patients with renal tumors and an FLCN pathogenic variant seen at the National Institutes of Health and identified through a literature review, 5 (7%) reportedly died from metastatic RCC.[1] The tumor histology in these five patients included clear cell, tubulopapillary, and/or papillary features, which are known to have a more biologically aggressive natural history. Death related to BHD-related oncocytoma and chromophobe neoplasms is exceedingly uncommon. Similar to von Hippel-Lindau disease and hereditary papillary renal carcinoma, the renal parenchyma of BHD patients commonly shows microscopic renal tumors adjacent to RCCs. The presence of microscopic oncocytosis provides histologic evidence that patients with BHD have a lifetime risk of developing renal tumors. The high frequency of FLCN somatic "second hits" (70%) in BHD-associated renal tumors supports the hypothesis that FLCN functions as a tumor suppressor gene.[16] Acquired somatic FLCN mutations have been only rarely identified in sporadic ccRCC.[17,18]

### Other Manifestations

Bilateral multifocal parotid oncocytomas [19] have been reported in eight patients with BHD.[1,2,19-21] The bilateral, multifocal presentation of these rare tumors, in combination with recent molecular investigations, has led to the speculation that parotid oncocytomas might be part of the BHD phenotypic spectrum.

It should be noted that germline FLCN variants were also found in patients without cutaneous findings but suspected of having BHD because of their specific renal and pulmonary manifestations.[21]

Lipomas, angiolipomas,[22] collagenomas,[4] cutaneous neurothekeomas, meningiomas,[23] multinodular goiters of thyroid,[24,25] ovarian cysts,[25] parathyroid adenomas,[22] pulmonary histiocytomas,[26] and chorioretinal lesions [25,27] have all been reported in patients with BHD. Whether these manifestations are truly associated with BHD remains to be determined.

Although initial epidemiologic observations linked BHD to an increased risk for colon polyps, subsequent epidemiologic studies did not confirm this association.[10,18,28] In a study from the Netherlands, individuals with BHD did not have increased colorectal cancer (CRC) prevalence when compared with their unaffected relatives, despite individuals with BHD participating in enhanced CRC screening.[29]

### References

Toro JR, Wei MH, Glenn GM, et al.: BHD mutations, clinical and molecular genetic investigations of Birt-Hogg-Dubé syndrome: a new series of 50 families and a review of published reports. J Med Genet 45 (6): 321-31, 2008.18234728
Schmidt LS, Nickerson ML, Warren MB, et al.: Germline BHD-mutation spectrum and phenotype analysis of a large cohort of families with Birt-Hogg-Dubé syndrome. Am J Hum Genet 76 (6): 1023-33, 2005.15852235
Schmidt LS, Linehan WM: Molecular genetics and clinical features of Birt-Hogg-Dubé syndrome. Nat Rev Urol 12 (10): 558-69, 2015.26334087
Toro JR, Glenn G, Duray P, et al.: Birt-Hogg-Dubé syndrome: a novel marker of kidney neoplasia. Arch Dermatol 135 (10): 1195-202, 1999.10522666
Graham RB, Nolasco M, Peterlin B, et al.: Nonsense mutations in folliculin presenting as isolated familial spontaneous pneumothorax in adults. Am J Respir Crit Care Med 172 (1): 39-44, 2005.15805188
Painter JN, Tapanainen H, Somer M, et al.: A 4-bp deletion in the Birt-Hogg-Dubé gene (FLCN) causes dominantly inherited spontaneous pneumothorax. Am J Hum Genet 76 (3): 522-7, 2005.15657874
Vernooij M, Claessens T, Luijten M, et al.: Birt-Hogg-Dubé syndrome and the skin. Fam Cancer 12 (3): 381-5, 2013.23307118
Toro JR, Pautler SE, Stewart L, et al.: Lung cysts, spontaneous pneumothorax, and genetic associations in 89 families with Birt-Hogg-Dubé syndrome. Am J Respir Crit Care Med 175 (10): 1044-53, 2007.17322109
Matsumoto K, Lim D, Pharoah PD, et al.: A systematic review assessing the existence of pneumothorax-only variants of FLCN. Implications for lifelong surveillance of renal tumours. Eur J Hum Genet 29 (11): 1595-1600, 2021.34267338
Zbar B, Alvord WG, Glenn G, et al.: Risk of renal and colonic neoplasms and spontaneous pneumothorax in the Birt-Hogg-Dubé syndrome. Cancer Epidemiol Biomarkers Prev 11 (4): 393-400, 2002.11927500
Pavlovich CP, Walther MM, Eyler RA, et al.: Renal tumors in the Birt-Hogg-Dubé syndrome. Am J Surg Pathol 26 (12): 1542-52, 2002.12459621 22346902
Pavlovich CP, Grubb RL, Hurley K, et al.: Evaluation and management of renal tumors in the Birt-Hogg-Dubé syndrome. J Urol 173 (5): 1482-6, 2005.15821464
Shuch B, Vourganti S, Ricketts CJ, et al.: Defining early-onset kidney cancer: implications for germline and somatic mutation testing and clinical management. J Clin Oncol 32 (5): 431-7, 2014.24378414
Sattler EC, Reithmair M, Steinlein OK: Kidney cancer characteristics and genotype-phenotype-correlations in Birt-Hogg-Dubé syndrome. PLoS One 13 (12): e0209504, 2018.30586397
Howlader N, Noone AM, Krapcho M, et al.: SEER Cancer Statistics Review (CSR) 1975-2017. Bethesda, Md: National Cancer Institute, 2020. Available online (https://seer.cancer.gov/csr/1975_2017/). Last accessed February 7, 2025.
Vocke CD, Yang Y, Pavlovich CP, et al.: High frequency of somatic frameshift BHD gene mutations in Birt-Hogg-Dubé-associated renal tumors. J Natl Cancer Inst 97 (12): 931-5, 2005.15956655
da Silva NF, Gentle D, Hesson LB, et al.: Analysis of the Birt-Hogg-Dubé (BHD) tumour suppressor gene in sporadic renal cell carcinoma and colorectal cancer. J Med Genet 40 (11): 820-4, 2003.14627671
Khoo SK, Kahnoski K, Sugimura J, et al.: Inactivation of BHD in sporadic renal tumors. Cancer Res 63 (15): 4583-7, 2003.12907635
Liu V, Kwan T, Page EH: Parotid oncocytoma in the Birt-Hogg-Dubé syndrome. J Am Acad Dermatol 43 (6): 1120-2, 2000.11100034
Vinit J, Friedel J, Bielefeld P, et al.: [Birt-Hogg-Dubé syndrome and multiple recurrent tumors]. Rev Med Interne 32 (3): e40-2, 2011.20576330
Maffé A, Toschi B, Circo G, et al.: Constitutional FLCN mutations in patients with suspected Birt-Hogg-Dubé syndrome ascertained for non-cutaneous manifestations. Clin Genet 79 (4): 345-54, 2011.20618353
Chung JY, Ramos-Caro FA, Beers B, et al.: Multiple lipomas, angiolipomas, and parathyroid adenomas in a patient with Birt-Hogg-Dube syndrome. Int J Dermatol 35 (5): 365-7, 1996.8734663
Vincent A, Farley M, Chan E, et al.: Birt-Hogg-Dubé syndrome: two patients with neural tissue tumors. J Am Acad Dermatol 49 (4): 717-9, 2003.14512924
Drummond C, Grigoris I, Dutta B: Birt-Hogg-Dubé syndrome and multinodular goitre. Australas J Dermatol 43 (4): 301-4, 2002.12423440
Welsch MJ, Krunic A, Medenica MM: Birt-Hogg-Dubé Syndrome. Int J Dermatol 44 (8): 668-73, 2005.16101870
Tomassetti S, Carloni A, Chilosi M, et al.: Pulmonary features of Birt-Hogg-Dubé syndrome: cystic lesions and pulmonary histiocytoma. Respir Med 105 (5): 768-74, 2011.21356586
Walter P, Kirchhof B, Korge B, et al.: Flecked chorioretinopathy associated with Birt-Hogg-Dubé syndrome. Graefes Arch Clin Exp Ophthalmol 235 (6): 359-61, 1997.9202964
Nahorski MS, Lim DH, Martin L, et al.: Investigation of the Birt-Hogg-Dube tumour suppressor gene (FLCN) in familial and sporadic colorectal cancer. J Med Genet 47 (6): 385-90, 2010.20522427
van de Beek I, Glykofridis IE, Wolthuis RMF, et al.: No evidence for increased prevalence of colorectal carcinoma in 399 Dutch patients with Birt-Hogg-Dubé syndrome. Br J Cancer 122 (4): 590-594, 2020.31857718

## Risk Assessment for Birt-Hogg-Dubé Syndrome (BHD)

### Genetic Testing

FLCN is the only gene known to be associated with BHD. It is located on chromosome 17p11.2.[1] Molecular testing is available for clinical applications such as diagnostic testing and prenatal diagnosis. Of families with BHD, 53% (27 of 51) were found to have an insertion or deletion in the polycytosine tract in exon 11 (a variant hot spot).[2] Bidirectional DNA sequencing of all FLCN-coding exons (exon 4–14) resulted in a pathogenic variant detection rate of 84%.[2,3] This rate has been further improved by the development of real time-quantitative polymerase chain reaction and multiplex ligation-dependent probe amplification assays to detect intragenic deletions and duplications;[4] these assays are available on a clinical basis.

Genetic testing performed in a Clinical Laboratory Improvement Amendments (CLIA)-certified laboratory is indicated for all individuals known to have or suspected of having BHD, including individuals with the following:

1. Five or more facial or truncal papules with at least one histologically confirmed fibrofolliculoma [5] with or without family history of BHD.
2. A family history of BHD with a single fibrofolliculoma or a single renal tumor or history of spontaneous pneumothorax.
3. Multiple and bilateral chromophobe, and/or oncocytic hybrid renal tumors.
4. A single chromophobe, or oncocytic hybrid tumor and a family history of renal cancer with any of above renal cell tumor types.
5. A family history of autosomal dominant primary spontaneous pneumothorax without a history of lung cyst.

### Genetic Counseling

BHD syndrome is inherited in an autosomal dominant manner. If a parent of a proband is clinically affected or has a FLCN pathogenic variant, the siblings of the proband have a 50% chance of inheriting the variant. The degree of clinical severity is not predictable. Prenatal diagnosis of BHD is possible in pregnancies that have a 50% chance of inheriting a FLCN pathogenic variant if the disease-causing variant has been identified in an affected family member.

The Cancer Genetics Risk Assessment and Counseling summary can provide more information about the following topics:

- For more information about prenatal diagnosis of hereditary cancer syndromes, see the Genetic testing and assisted reproductive technology section.
- For more information about autosomal dominant inheritance, see the Analysis of the family history section.
- For more information about testing family members for a pathogenic variant, see the Cascade Genetic Testing of Family Members section.

### Clinical Diagnosis

The three major features of BHD include cutaneous lesions, lung manifestations (lung cysts and spontaneous pneumothoraxes), and renal tumors.[2,3] For more information about these BHD manifestations, see the Clinical Manifestations section.

The dermatologic diagnosis of BHD is made in individuals who have five or more facial or truncal papules with at least one histologically confirmed fibrofolliculoma.[5] An adequate biopsy (typically a punch biopsy) is required to make a diagnosis of fibrofolliculoma. An expert panel has developed the following diagnostic criteria for BHD (patients must fulfill one major or two minor criteria for diagnosis):[6]

- Major criteria:
  - At least five fibrofolliculomas/trichodiscomas, at least one histologically confirmed, of adult onset.
  - Germline FLCN pathogenic variant.
- Minor criteria:
  - Multiple lung cysts: bilateral, basally located lung cysts with no other apparent cause, with or without spontaneous primary pneumothorax.
  - Renal cancer: early-onset (age <50 y) or multifocal or bilateral renal cancer, or renal cancer of mixed chromophobe and oncocytic histology.
  - A first-degree relative with BHD.

#### Differential diagnosis

It is important to distinguish between BHD-associated RCC and sporadic RCC because this may have implications for management. Genetic testing for a pathogenic variant in FLCN, a family history of BHD, or the presence of extrarenal manifestations associated with BHD are helpful in establishing a diagnosis of this condition. Because a variety of histological variants of kidney cancer can be seen in association with BHD, it is often necessary to make a histological diagnosis to help differentiate between the benign tumors (oncocytomas) and those with a malignant potential (chromophobe, clear cell, and papillary RCC).[7]

The differential diagnosis of pulmonary cysts includes lymphangioleiomyomatosis (LAM); distinguishing this from BHD can be clinically challenging. One study proposed a set of findings that permit differentiation between BHD and LAM.[8] These include bibasilar, peripheral, and subpleural distribution for BHD versus diffuse distribution for LAM; elliptical or lentiform shape for BHD-related cysts versus round shape for LAM; and HMB-45 negativity on immunohistochemical staining for BHD versus HMB-45 positivity for LAM. This approach has not been validated; further study is warranted.

### References

Schmidt LS, Warren MB, Nickerson ML, et al.: Birt-Hogg-Dubé syndrome, a genodermatosis associated with spontaneous pneumothorax and kidney neoplasia, maps to chromosome 17p11.2. Am J Hum Genet 69 (4): 876-82, 2001.11533913 21426341
Schmidt LS, Nickerson ML, Warren MB, et al.: Germline BHD-mutation spectrum and phenotype analysis of a large cohort of families with Birt-Hogg-Dubé syndrome. Am J Hum Genet 76 (6): 1023-33, 2005.15852235
Toro JR, Wei MH, Glenn GM, et al.: BHD mutations, clinical and molecular genetic investigations of Birt-Hogg-Dubé syndrome: a new series of 50 families and a review of published reports. J Med Genet 45 (6): 321-31, 2008.18234728
Benhammou JN, Vocke CD, Santani A, et al.: Identification of intragenic deletions and duplication in the FLCN gene in Birt-Hogg-Dubé syndrome. Genes Chromosomes Cancer 50 (6): 466-77, 2011.21412933
Toro JR, Glenn G, Duray P, et al.: Birt-Hogg-Dubé syndrome: a novel marker of kidney neoplasia. Arch Dermatol 135 (10): 1195-202, 1999.10522666
Menko FH, van Steensel MA, Giraud S, et al.: Birt-Hogg-Dubé syndrome: diagnosis and management. Lancet Oncol 10 (12): 1199-206, 2009.19959076
Pavlovich CP, Grubb RL, Hurley K, et al.: Evaluation and management of renal tumors in the Birt-Hogg-Dubé syndrome. J Urol 173 (5): 1482-6, 2005.15821464
Gupta N, Seyama K, McCormack FX: Pulmonary manifestations of Birt-Hogg-Dubé syndrome. Fam Cancer 12 (3): 387-96, 2013.23715758

## Surveillance for Birt-Hogg-Dubé Syndrome (BHD)

BHD patients display two main clinical presentations. Most commonly, individuals present with a documented family history of BHD. Other presentations include individuals without a BHD family history or one that is unknown. In the former clinical scenario, if the patient's biological relative has a genetic diagnosis with an identified FLCN pathogenic variant, the patient may choose to begin evaluation with genetic counseling and pathogenic variant testing.

Clinical surveillance for individuals at risk of BHD includes dermatologic, radiological, and histological examinations to identify characteristic cutaneous lesions, renal tumors, and lung cysts, with or without a history of spontaneous pneumothorax. Not all features are present in each at-risk individual, and some BHD family members may have no discernible phenotypic findings (i.e., they are clinically unaffected carriers of deleterious FLCN variants). This clinical scenario is being encountered with increasing frequency as the number of syndrome-associated genes for which pathogenic variant testing can be offered clinically expands. In most disorders, the natural history of genetically abnormal/clinically normal individuals has not yet been well characterized. These major features of BHD are described in the Clinical diagnosis section.

Decisions regarding the use of lifelong surveillance for hereditary RCC syndromes must consider both risks and benefits. Approximately 15% to 29% of individuals with BHD have renal tumors,[1,2] which are commonly bilateral and multifocal and include a number of specific histologies within an individual or family.[3] For at-risk individuals who will undergo periodic imaging for many years even when no tumor is present, a surveillance schedule that minimizes the lifetime dose of radiation is advised.

Contrast-enhanced computed tomography (CT) or magnetic resonance imaging (MRI) are both useful modalities for the detection of BHD-associated renal tumors.[3] Ultrasonography alone may not be sufficient for detecting renal tumors because some tumors are isoechoic with the renal parenchyma,[4] but they may help identify renal cysts. A series in the Netherlands failed to detect 9 of 18 renal tumors using ultrasonography alone. Thus, while ultrasonography may reliably detect larger lesions, it is not a reliable modality for detecting smaller lesions and is therefore not used routinely as a lone screening tool.[5] If a renal tumor is detected, the patient is referred to a urological oncology surgeon for management, which may include continued monitoring or surgery, depending mainly on tumor size.[3] If no renal tumor is detected on initial imaging, experts recommend lifelong surveillance at least once every 36 months because of the risk of developing RCC.[4] Because MRI spares the patient from exposure to radiation, it is reasonable to assume that it may be the preferred mode of imaging over CT for lifelong surveillance.

Level of evidence: 5

### References

Zbar B, Alvord WG, Glenn G, et al.: Risk of renal and colonic neoplasms and spontaneous pneumothorax in the Birt-Hogg-Dubé syndrome. Cancer Epidemiol Biomarkers Prev 11 (4): 393-400, 2002.11927500
Schmidt LS, Nickerson ML, Warren MB, et al.: Germline BHD-mutation spectrum and phenotype analysis of a large cohort of families with Birt-Hogg-Dubé syndrome. Am J Hum Genet 76 (6): 1023-33, 2005.15852235
Pavlovich CP, Grubb RL, Hurley K, et al.: Evaluation and management of renal tumors in the Birt-Hogg-Dubé syndrome. J Urol 173 (5): 1482-6, 2005.15821464
Stamatakis L, Metwalli AR, Middelton LA, et al.: Diagnosis and management of BHD-associated kidney cancer. Fam Cancer 12 (3): 397-402, 2013.23703644
Johannesma PC, van de Beek I, van der Wel TJWT, et al.: Renal imaging in 199 Dutch patients with Birt-Hogg-Dubé syndrome: Screening compliance and outcome. PLoS One 14 (3): e0212952, 2019.30845233

## Management of Disease Manifestations for Birt-Hogg-Dubé Syndrome (BHD)

### Management of Skin Manifestations

Cryotherapy, electrodessication, surgery, and laser therapy have been used with good cosmetic results, but relapse usually occurs because the cutaneous lesions are a manifestation of an inherited skin condition.[1-3] Therefore, patients may require continuous cosmetic care. Some patients with BHD are emotionally affected by their dermatologic condition, regardless of the number or extent of cutaneous lesions. Therefore, the psychological state of patients with BHD warrants consideration, with skin care recommendations appropriately tailored to individual needs.

Level of evidence: 5

### Management of Renal Manifestations

Partial nephrectomy is the treatment of choice in the management of BHD-related kidney neoplasms, to preserve optimal long-term kidney function in patients at risk of multiple primary renal tumors. However, this renal-sparing surgery depends on the size and location of the tumors found during surgery. It is important to incorporate knowledge of the high cumulative risk of multifocal and bilateral kidney tumors in this syndrome, as surgical management is planned. In general, renal tumors smaller than 3 cm in diameter may be monitored radiologically under the close supervision of the urological oncology surgeon; immediate surgery may not be required.[4] These are general recommendations, and each case should be evaluated carefully and managed individually. Total nephrectomy may be necessary in some cases.

Surveillance of at-risk individuals and relatives includes abdominal/pelvic MRI or CT scans and evaluation of renal tumors by urological surgeons and radiologists experienced in the management of these complicated patients. Use of genetic testing for early identification of at-risk family members improves diagnostic certainty and eliminates costly and stressful screening procedures in at-risk relatives who have not inherited their family's disease-causing variant.

Level of evidence: 4

### Management of Spontaneous Pneumothorax

The management of spontaneous pneumothorax in patients with BHD is similar to that employed in the general population.[5]

The clinical presentation of spontaneous pneumothorax in patients with BHD is variable. Therapy is dictated by the underlying lung condition and general health of the patient. One study reported that of 101 patients with spontaneous pneumothoraces, 78 required medical intervention, and 23 were managed by observation alone.[5] Thirty-five percent of patients with pneumothoraces were treated with tube thoracostomy (chest tube) only; 14% were treated by open thoracotomy and a second treatment, including mechanical or chemical pleurodesis and lung resection; and approximately 13% were treated with combined tube thoracostomy, thoracotomy, and a third treatment, including mechanical or chemical pleurodesis or lung resection. Patients with BHD—especially those with multiple lung cysts—should be advised to avoid or be cautious with scuba diving, air travel, and mechanical ventilation because each exposure increases the risk of spontaneous pneumothorax.[5]

Level of evidence: 4

### References

Jacob CI, Dover JS: Birt-Hogg-Dube syndrome: treatment of cutaneous manifestations with laser skin resurfacing. Arch Dermatol 137 (1): 98-9, 2001.11176677
Gambichler T, Wolter M, Altmeyer P, et al.: Treatment of Birt-Hogg-Dubé syndrome with erbium:YAG laser. J Am Acad Dermatol 43 (5 Pt 1): 856-8, 2000.11050594
Kahle B, Hellwig S, Schulz T: [Multiple mantleomas in Birt-Hogg-Dubé syndrome: successful therapy with CO2 laser] Hautarzt 52 (1): 43-6, 2001.11220238
Pavlovich CP, Grubb RL, Hurley K, et al.: Evaluation and management of renal tumors in the Birt-Hogg-Dubé syndrome. J Urol 173 (5): 1482-6, 2005.15821464
Toro JR, Pautler SE, Stewart L, et al.: Lung cysts, spontaneous pneumothorax, and genetic associations in 89 families with Birt-Hogg-Dubé syndrome. Am J Respir Crit Care Med 175 (10): 1044-53, 2007.17322109

## Prognosis

The major cause of morbidity and mortality in Birt-Hogg-Dubé syndrome (BHD) is related to renal lesions. Because of the rarity of BHD, it is difficult to generate robust overall survival data on populations of patients with the syndrome; however, when patients are managed with an appropriate surveillance and intervention strategy, their life expectancy should not be significantly different from that of matched individuals in the general population.

While a majority of patients have excellent outcomes when tumors are detected early and removed surgically, there is a risk of metastasis with larger tumors; the optimal management for metastatic disease is unclear.[1]

### References

Johannesma PC, van de Beek I, van der Wel TJWT, et al.: Renal imaging in 199 Dutch patients with Birt-Hogg-Dubé syndrome: Screening compliance and outcome. PLoS One 14 (3): e0212952, 2019.30845233

## Future Directions

Since FLCN, the gene responsible for Birt-Hogg-Dubé syndrome, was identified in 2001, a number of studies have elucidated its function and possible genotype-phenotype correlations. Although surveillance followed by surgical resection remains the mainstay of disease management, improvements in early detection and in molecularly targeted early intervention may alter the course of this disease in the kidney and decrease the incidence of overt and/or lethal renal manifestations. A better understanding of the biochemical function of the FLCN protein should provide insights into target identification and validation of medical therapy for localized, locally advanced, and metastatic disease.

## Latest Updates to This Summary (12/16/2024)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

The summary was extensively revised.

This summary is written and maintained by the PDQ Cancer Genetics Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/genetics), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the genetics of Birt-Hogg-Dubé syndrome. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Cancer Genetics Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/genetics), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Birt-Hogg-Dubé Syndrome are:

- Alexandra Perez Lebensohn, MS, CGC (National Cancer Institute)
- Brian Matthew Shuch, MD (UCLA Health)
- Ramaprasad Srinivasan, MD, PhD (National Cancer Institute)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Cancer Genetics Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Cancer Genetics Editorial Board. PDQ Birt-Hogg-Dubé Syndrome. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/publications/pdq/information-summaries/genetics/bhd-syndrome-hp-pdq. Accessed <MM/DD/YYYY>. [PMID: 33724752]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).